# Acute Myeloid Leukemia Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of adult acute myeloid leukemia. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Acute Myeloid Leukemia

Key Points for This Section
- Adult acute myeloid leukemia (AML) is a type of cancer in which the bone marrow makes a large number of abnormal blood cells.
- Leukemia may affect red blood cells, white blood cells, and platelets.
- There are different subtypes of AML.
- Smoking, previous chemotherapy treatment, and exposure to radiation may increase the risk of AML.
- Signs and symptoms of AML include fever, feeling tired, and easy bruising or bleeding.
- Tests that examine the blood and bone marrow are used to diagnose AML.
- After AML has been diagnosed, tests are done to find out if the cancer has spread to other parts of the body.
- Some people decide to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Adult acute myeloid leukemia (AML) is a type of cancer in which the bone marrow makes a large number of abnormal blood cells.

AML is a cancer of the blood and bone marrow. It is the most common type of acute leukemia in adults. This type of cancer usually gets worse quickly if it is not treated. AML is also called acute myelogenous leukemia and acute nonlymphocytic leukemia.

Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.

Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.

### Leukemia may affect red blood cells, white blood cells, and platelets.

The bone marrow makes blood stem cells (immature cells) that become mature blood cells over time. A blood stem cell may become a myeloid stem cell or a lymphoid stem cell.

Myeloid stem cells go through several stages of development in the bone marrow before fully maturing into:

- red blood cells that carry oxygen and other substances to all tissues of the body
- granulocytes and other types of white blood cells that help the body’s immune system respond to infection, allergens, and inflammation
- platelets that help stop bleeding by forming clots

Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.

Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. Drawing shows a myeloid stem cell becoming a red blood cell, platelet, or myeloblast, which then becomes a white blood cell. Drawing also shows a lymphoid stem cell becoming a lymphoblast and then one of several different types of white blood cells.

In AML, there is an increase in the number of immature white blood cells called myeloblasts (or myeloid blasts). The myeloblasts in AML are abnormal and do not become healthy white blood cells. As the number of these cells, also called leukemia cells, increases in the blood and bone marrow, there is less room for healthy platelets, red blood cells, and other white blood cells. This may lead to easy bleeding, anemia, and infection.

The leukemia cells can spread outside the blood to other parts of the body, including the central nervous system (CNS; brain and spinal cord), skin, and gums. Sometimes leukemia cells form a solid tumor called a myeloid sarcoma. Myeloid sarcoma is also called extramedullary myeloid tumor, granulocytic sarcoma, or chloroma.

### There are different subtypes of AML.

Most AML subtypes are based on how mature (developed) the cancer cells are at the time of diagnosis, and how different they are from normal cells.

Acute promyelocytic leukemia (APL) is a subtype of AML. This leukemia occurs when genes on chromosome 15 switch places with some genes on chromosome 17, and an abnormal gene called PML::RARA is made. The PML::RARA gene sends a message that stops promyelocytes (a type of white blood cell) from maturing. Problems with severe bleeding and blood clots may occur. This is a serious health problem that needs treatment as soon as possible. APL usually occurs in middle-aged adults.

### Smoking, previous chemotherapy treatment, and exposure to radiation may increase the risk of AML.

AML is caused by certain changes to the way blood stem cells function, especially how they grow and divide into new cells. A risk factor is anything that increases the chance of getting a disease. Some risk factors for AML, like smoking, can be changed. However, risk factors also include things people cannot change, like their genetics, getting older, and their health history.

There are many risk factors for AML, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to AML. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

Having one or more of these risk factors does not mean that you will get AML. Many people with risk factors never develop AML, while others with no known risk factors do.

Possible risk factors for AML include:

- being male
- older age
- smoking
- having had treatment with chemotherapy or radiation therapy in the past
- being exposed to radiation in the environment (such as nuclear radiation) or to the chemical benzene
- having a personal history of a blood disorder such as myelodysplastic syndrome
- having certain syndromes or inherited disorders

Talk with your doctor if you think you may be at risk.

### Signs and symptoms of AML include fever, feeling tired, and easy bruising or bleeding.

The early signs and symptoms of AML may be like those caused by the flu or other common diseases. Check with your doctor if you have:

- weakness or feeling tired
- fever
- infection
- paleness or loss of normal skin color
- bleeding

Less common signs or symptoms may be caused by clusters of leukemia cells in the CNS or testicles, or a tumor of myeloid cells called a chloroma.

Symptoms of acute leukemia often develop between 4 and 6 weeks before diagnosis.

### Tests that examine the blood and bone marrow are used to diagnose AML.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Complete blood count (CBC) checks a sample of blood for:
  - the number of red blood cells and platelets
  - the number and type of white blood cells
  - the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
  - the amount of hematocrit (whole blood that is made up of red blood cells)
  Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
  Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
- Peripheral blood smear checks a sample of blood for blast cells, the number and kinds of white blood cells, the number of platelets, and changes in the shape of blood cells.
- Flow cytometry measures the number of cells in a sample, the percentage of live cells in a sample, and certain characteristics of the cells, such as size, shape, and the presence of tumor (or other) markers on the cell surface. The cells from a sample of a patient's blood, bone marrow, or other tissue are stained with a fluorescent dye, placed in a fluid, and then passed one at a time through a beam of light. The test results are based on how the cells that were stained with the fluorescent dye react to the beam of light. This test is used to help diagnose and manage certain types of cancers, such as leukemia and lymphoma.
- Bone marrow aspiration and biopsy is the removal of bone marrow, blood, and a small piece of bone by inserting a hollow needle into the hipbone or breastbone. A pathologist views the bone marrow, blood, and bone under a microscope to look for signs of cancer.
  Bone marrow aspiration and biopsy. After a small area of skin is numbed, a long, hollow needle is inserted through the patient's skin and hip bone into the bone marrow. A sample of bone marrow and a small piece of bone are removed for examination under a microscope.
  Bone marrow aspiration and biopsy; drawing shows a patient lying face down on a table and a bone marrow needle being inserted into the hip bone. An inset shows a close up of the needle being inserted through the skin and hip bone into the bone marrow.
- Tumor biopsy is the removal of cells or tissues from a lump using a needle. This may be done if the doctor suspects the leukemia cells may have formed a solid tumor called a myeloid sarcoma (also called a chloroma).
- Cytogenetic analysis checks the chromosomes of cells in a blood or bone marrow sample for changes, such as broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working. Other tests, such as fluorescence in situ hybridization (FISH), may also be done to look for certain changes in the chromosomes.
- Molecular testing checks for certain genes, proteins, or other molecules in a sample of blood or bone marrow. Molecular tests also check for certain changes in a gene or chromosome that may cause or affect the chance of developing AML. A molecular test may be used to help plan treatment, find out how well treatment is working, or make a prognosis.
- Immunophenotyping uses antibodies to identify cancer cells based on the types of antigens or markers on the surface of the cells. This test is used to help diagnose specific types of leukemia. For example, a cytochemistry study may test the cells in a sample of tissue using chemicals (dyes) to look for certain changes in the sample. A chemical may cause a color change in one type of leukemia cell but not in another type of leukemia cell.
- Reverse transcription–polymerase chain reaction test (RT-PCR) measures the amount of a genetic substance called mRNA made by a specific gene. An enzyme called reverse transcriptase is used to convert a specific piece of RNA into a matching piece of DNA, which can be amplified (made in large numbers) by another enzyme called DNA polymerase. The amplified DNA copies help tell whether a specific mRNA is being made by a gene. RT-PCR can be used to check the activation of certain genes that may indicate the presence of cancer cells. This test may be used to look for certain changes in a gene or chromosome, which may help diagnose cancer. This test is used to diagnose certain types of AML including acute promyelocytic leukemia (APL).

### After AML has been diagnosed, tests are done to find out if the cancer has spread to other parts of the body.

The following tests and procedures may be used to determine if the leukemia has spread outside the blood and bone marrow:

- Lumbar puncture is a procedure used to collect a sample of cerebrospinal fluid (CSF) from the spinal column. This is done by placing a needle between two bones in the spine and into the lining around the spinal cord to remove a sample of CSF. The sample of CSF is checked under a microscope for signs that leukemia cells have spread to the brain and spinal cord. This procedure is also called an LP or spinal tap.
  Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.
  Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the abdomen. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

### Some people decide to get a second opinion.

You may want to get a second opinion to confirm your AML diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI’s Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, visit Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options for AML depend on:

- the person's age
- whether the leukemia has spread to the CNS
- whether the patient has a systemic infection at the time of diagnosis
- whether the patient has a very high white blood cell count at the time of diagnosis
- the subtype of AML
- whether the patient received chemotherapy or radiation therapy in the past to treat a different cancer
- whether there is a history of a blood disorder such as myelodysplastic syndrome
- whether the cancer has been treated before or recurred (come back)

It is important to treat AML right away. Older age at diagnosis may be linked to lower remission rates and more complications.

## Stages of Acute Myeloid Leukemia

Key Points for This Section
- There is no standard staging system for acute myeloid leukemia (AML).

### There is no standard staging system for acute myeloid leukemia (AML).

The extent or spread of cancer is usually described as stages. Instead of stages, AML treatment is based on one or more of the following:

- the subtype of AML
- whether the leukemia has spread outside the blood and bone marrow
- whether the leukemia is newly diagnosed, in remission, refractory, or recurrent

Newly diagnosed (untreated) AML

In untreated AML, the disease is newly diagnosed. It has not been treated except to relieve signs and symptoms such as fever, bleeding, or pain, and the following are true:

- The complete blood count (CBC) is abnormal.
- At least 20% of the cells in the bone marrow are blasts (leukemia cells) or there are certain gene changes.
- There are signs or symptoms of leukemia.

AML in remission

In AML in remission, the disease has been treated and the following are true:

- The CBC is normal.
- Less than 5% of the cells in the bone marrow are blasts (leukemia cells).
- There are no signs or symptoms of leukemia in the brain and spinal cord or elsewhere in the body.

Refractory or recurrent AML

After treatment with chemotherapy, some people with newly diagnosed AML will not go into remission. This is called refractory cancer. In contrast, recurrent AML is cancer that has recurred (come back) after remission. The AML may come back in the blood or bone marrow.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for people with acute myeloid leukemia (AML).
- The treatment of AML usually has two phases.
- Patients receive supportive care for side effects of treatment.
- The following types of treatment are used:
  - Chemotherapy
  - Radiation therapy
  - Chemotherapy with stem cell transplant
  - Targeted therapy
  - Other drug therapy
- New types of treatment are being tested in clinical trials.
- Treatment for acute myeloid leukemia may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for people with acute myeloid leukemia (AML).

Different types of treatments are available for people with AML. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the phase of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You'll want to learn what you need to do before treatment begins, how you'll feel while going through it, and what kind of help you will need. Learn more at Questions to Ask Your Doctor about Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

### The treatment of AML usually has two phases.

There are two treatment phases of AML:

- Remission induction therapy is the first phase of treatment. The goal is to kill the leukemia cells in the blood and bone marrow. This puts the leukemia into remission.
- Consolidation therapy is the second phase of treatment. It begins after the leukemia is in remission. The goal of consolidation therapy is to kill any remaining leukemia cells that may not be active but could begin to regrow and cause a relapse. This phase is also called remission continuation therapy.

### Patients receive supportive care for side effects of treatment.

Patients must be closely monitored during treatment of AML. Myelosuppression, a condition which results in fewer red blood cells, white blood cells, and platelets, is a side effect of both AML and treatment with chemotherapy. Supportive care during remission induction therapy may include:

- red blood cell and platelet transfusions to replace blood cells destroyed by the cancer or its treatment
- antibiotics and antifungals to prevent or treat infections

### The following types of treatment are used:

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. The way the chemotherapy is given depends on the subtype of AML being treated and whether the leukemia cells have spread to the central nervous system (CNS; brain and spinal cord).

Systemic chemotherapy is when chemotherapy drugs are taken by mouth or injected into a vein or muscle. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body.

Systemic chemotherapy drugs used to treat AML include:

- azacitidine (https://www.cancer.gov/about-cancer/treatment/drugs/azacitidine)
- cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
- daunorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochloride)
- daunorubicin and cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/daunorubicinhydrochlorideandcytarabineliposome)
- decitabine (https://www.cancer.gov/about-cancer/treatment/drugs/decitabine)
- idarubicin (https://www.cancer.gov/about-cancer/treatment/drugs/idarubicinhydrochloride)
- midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin)
- mitoxantrone (https://www.cancer.gov/about-cancer/treatment/drugs/mitoxantronehydrochloride)

Combinations of these drugs may be used. Other chemotherapy drugs not listed here may also be used.

Intrathecal chemotherapy may be used to treat AML that has spread to the CNS (brain and spinal cord). Intrathecal chemotherapy is a method of placing chemotherapy directly into the cerebrospinal fluid, which is the fluid that surrounds the brain and spinal cord. This approach is used because the blood-brain barrier, a protective layer around the brain, can prevent chemotherapy drugs given by mouth or into a vein from reaching the CNS.

Cytarabine and methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium) are two chemotherapy drugs given as intrathecal chemotherapy to treat AML. These drugs can also be given systemically.

Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.

Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. AML is sometimes treated with external radiation therapy. This type of radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Total-body irradiation sends radiation toward the whole body. It is a type of external radiation that may be used to prepare the body for a stem cell transplant when the leukemia has recurred.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Chemotherapy with stem cell transplant

High doses of chemotherapy are given to kill cancer cells. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient or a donor and are frozen and stored. After the patient completes chemotherapy and/or total-body irradiation, the stored stem cells are thawed and given back to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.

Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.

Learn more about Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant).

#### Targeted therapy

Targeted therapy uses drugs or other substances to identify and attack specific cancer cells. Your doctor may suggest biomarker tests to help predict your response to certain targeted therapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Targeted therapies used to treat AML include:

- gemtuzumab ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/gemtuzumabozogamicin)
- midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin)
- quizartinib (https://www.cancer.gov/about-cancer/treatment/drugs/quizartinib-dihydrochloride)
- revumenib (https://www.cancer.gov/about-cancer/treatment/drugs/revumenib-citrate)

Less-intensive targeted therapies in people who are unable or unwilling to receive other treatments include:

- enasidenib (https://www.cancer.gov/about-cancer/treatment/drugs/enasidenibmesylate)
- gilteritinib (https://www.cancer.gov/about-cancer/treatment/drugs/gilteritinibfumarate)
- glasdegib (https://www.cancer.gov/about-cancer/treatment/drugs/glasdegibmaleate)
- ivosidenib (https://www.cancer.gov/about-cancer/treatment/drugs/ivosidenib)
- venetoclax (https://www.cancer.gov/about-cancer/treatment/drugs/venetoclax)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Other drug therapy

Arsenic trioxide and all-trans retinoic acid (ATRA) are anticancer drugs that kill leukemia cells, stop the leukemia cells from dividing, or help the leukemia cells mature into white blood cells. These drugs are used in the treatment of a subtype of AML called acute promyelocytic leukemia.

### New types of treatment are being tested in clinical trials.

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for acute myeloid leukemia may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Untreated Acute Myeloid Leukemia

Standard treatment of untreated acute myeloid leukemia (AML) during the remission induction phase depends on the subtype of AML and may include:

- combination chemotherapy that includes cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
- combination chemotherapy with targeted therapy (midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin) or quizartinib (https://www.cancer.gov/about-cancer/treatment/drugs/quizartinib-dihydrochloride)), for people whose AML has a mutation in the FLT3 gene
- combination chemotherapy with the targeted therapy drug gemtuzumab ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/gemtuzumabozogamicin)
- intrathecal chemotherapy (cytarabine or methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)), for central nervous system (CNS) leukemia
- supportive care

For older adults or people who are unable or unwilling to receive intensive chemotherapy, the following may be continued as long as the person benefits or until toxic effects occur:

- targeted therapy (enasidenib (https://www.cancer.gov/about-cancer/treatment/drugs/enasidenibmesylate), gilteritinib (https://www.cancer.gov/about-cancer/treatment/drugs/gilteritinibfumarate), glasdegib (https://www.cancer.gov/about-cancer/treatment/drugs/glasdegibmaleate), ivosidenib (https://www.cancer.gov/about-cancer/treatment/drugs/ivosidenib), or venetoclax) (https://www.cancer.gov/about-cancer/treatment/drugs/venetoclax)
- low-dose chemotherapy (azacitidine (https://www.cancer.gov/about-cancer/treatment/drugs/azacitidine), low-dose cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine), or decitabine (https://www.cancer.gov/about-cancer/treatment/drugs/decitabine))
- targeted therapy with low-dose chemotherapy
- intrathecal chemotherapy, for CNS leukemia
- supportive care

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Acute Myeloid Leukemia in Remission

Treatment of acute myeloid leukemia (AML) during the remission phase depends on the subtype of AML and may include:

- combination chemotherapy that includes cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
- maintenance therapy with midostaurin (https://www.cancer.gov/about-cancer/treatment/drugs/midostaurin), for people whose AML has a mutation in the FLT3 gene
- maintenance therapy with chemotherapy
- high-dose chemotherapy and stem cell transplant using the patient's stem cells
- high-dose chemotherapy, with or without radiation therapy, or reduced-intensity therapy, followed by a stem cell transplant using donor stem cells

Learn more about these treatments in Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Refractory or Recurrent Acute Myeloid Leukemia

There is no standard treatment for refractory or recurrent acute myeloid leukemia (AML). Treatment depends on the subtype of AML and may include:

- combination chemotherapy
- targeted therapy with enasidenib (https://www.cancer.gov/about-cancer/treatment/drugs/enasidenibmesylate), gemtuzumab ozogamicin (https://www.cancer.gov/about-cancer/treatment/drugs/gemtuzumabozogamicin), gilteritinib (https://www.cancer.gov/about-cancer/treatment/drugs/gilteritinibfumarate), ivosidenib (https://www.cancer.gov/about-cancer/treatment/drugs/ivosidenib), or revumenib (https://www.cancer.gov/about-cancer/treatment/drugs/revumenib-citrate)
- stem cell transplant using donor stem cells

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Acute Promyelocytic Leukemia

Treatment of newly diagnosed acute promyelocytic leukemia (APL) may include:

- all-trans retinoic acid (ATRA) plus arsenic trioxide (https://www.cancer.gov/about-cancer/treatment/drugs/arsenictrioxide) (ATO), for low-risk to intermediate-risk disease
- ATRA plus combination chemotherapy, followed by ATO, for high-risk disease

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Acute Promyelocytic Leukemia

Treatment of recurrent acute promyelocytic leukemia (APL) may include:

- arsenic trioxide (https://www.cancer.gov/about-cancer/treatment/drugs/arsenictrioxide) (ATO) with or without chemotherapy
- stem cell transplant using the patient's stem cells or donor stem cells

Learn more about these treatments in the Treatment Option Overview.

## To Learn More About Leukemia

For more information from the National Cancer Institute about leukemia, visit the Leukemia Home Page (https://www.cancer.gov/types/leukemia).

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of adult acute myeloid leukemia. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Acute Myeloid Leukemia Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/leukemia/patient/adult-aml-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389377]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).